# Childhood Astrocytomas Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood astrocytomas. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## Childhood Glioma (Including Astrocytoma)

Gliomas are a group of tumors that arise from glial cells in the central nervous system (brain and spinal cord). Glial cells support and protect the brain's nerve cells (also called neurons). They hold nerve cells in place, bring food and oxygen to nerve cells, and help protect nerve cells from disease, such as infection. Gliomas can form in any area of the CNS and can be low grade or high grade.

Other types of tumors can form in glial cells and nerve cells. Neuronal tumors are rare tumors made up of nerve cells. Glioneuronal tumors are a mix of nerve cells and glial cells. Neuronal and glioneuronal tumors are rare, low-grade tumors and are treated the same as gliomas.

Although cancer is rare in children, brain tumors are the second most common type of childhood cancer, after leukemia.

Gliomas are most common in these parts of the CNS:

- Cerebrum, the largest part of the brain, at the top of the head. The cerebrum controls thinking, learning, problem-solving, speech, emotions, reading, writing, and voluntary movement.
- Cerebellum, the lower, back part of the brain (near the middle of the back of the head). The cerebellum controls voluntary movement, balance, and posture.
- Brain stem, the part of the brain that is connected to the spinal cord. The brain stem is in the lowest part of the brain (just above the back of the neck). It controls breathing, heart rate, and the nerves and muscles used in seeing, hearing, walking, talking, and eating.
- Hypothalamus, the area in the middle of the base of the brain. It controls body temperature, hunger, and thirst.
- Visual pathway, the group of nerves that connect the eye with the brain.
- Spinal cord, the column of nerve tissue that runs from the brain stem down the center of the back. It is covered by three thin layers of tissue called membranes. The spinal cord and membranes are surrounded by the vertebrae (back bones). Spinal cord nerves carry messages between the brain and the rest of the body, such as a message from the brain to cause muscles to move or a message from the skin to the brain to feel touch.

Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.

Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.

### Types of glioma, neuronal, and glioneuronal tumors

Astrocytoma is the most common type of glioma diagnosed in children. It starts in a type of star-shaped glial cell called an astrocyte. Astrocytomas can form anywhere in the central nervous system.

Optic pathway glioma is a type of low-grade (slow-growing) glioma that can grow in children with a genetic condition called neurofibromatosis type 1 (NF1).

There are many types of astrocytomas, other gliomas, neuronal tumors, and glioneuronal tumors including:

- diffuse pediatric-type high-grade glioma
- infant-type hemispheric glioma
- diffuse low-grade glioma
- diffuse astrocytoma
- pilocytic astrocytoma
- high-grade astrocytoma with piloid features
- pleomorphic xanthoastrocytoma
- subependymal giant cell astrocytoma
- ganglioglioma
- desmoplastic infantile ganglioglioma/desmoplastic infantile astrocytoma
- dysembryoplastic neuroepithelial tumor

Diffuse intrinsic pontine glioma (DIPG) is a type of high-grade glioma that forms in the brain stem and most often occurs in children. To learn more, see Diffuse Intrinsic Pontine Glioma (https://www.cancer.gov/types/brain/patient/diffuse-intrinsic-pontine-glioma).

Ependymoma is another type of tumor that can form from glial cells, but these tumors are not treated the same as gliomas. To learn more, see Childhood Ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma).

### Causes and risk factors for childhood glioma (including astrocytoma)

Gliomas are caused by certain changes to the way glial cells function, especially how they grow and divide into new cells. Often, the exact cause of cell changes that lead to glioma is unknown. To learn more about how cancer develops, see What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop a glioma, and it will develop in some children who don't have a known risk factor. Inherited genetic disorders that may be risk factors for glioma include:

- neurofibromatosis type 1
- tuberous sclerosis

Talk with your child's doctor if you think your child may be at risk of a glioma.

### Symptoms of childhood glioma (including astrocytoma)

The symptoms of childhood gliomas depend on the following factors:

- where the tumor forms in the brain or spinal cord
- the size of the tumor
- how fast the tumor grows
- your child's age and development

Some tumors do not cause symptoms while other tumors cause symptoms based on their location in the central nervous system. It's important to check with your child's doctor if your child has any symptoms below:

- morning headache or headache that goes away after vomiting
- nausea and vomiting
- vision, hearing, and speech problems
- loss of balance and trouble walking
- worsening handwriting or slow speech
- weakness or change in feeling on one side of the body
- unusual sleepiness
- more or less energy than usual
- change in personality or behavior
- seizures
- weight loss or weight gain for no known reason
- increase in the size of the head (in infants)

These symptoms may be caused by conditions other than childhood gliomas. The only way to know is to see your child's doctor.

### Tests to diagnose childhood glioma (including astrocytoma)

If your child has symptoms that suggest a central nervous system tumor such as glioma, the doctor will need to find out if they are due to cancer or another condition. The doctor will ask you when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam, including a neurologic exam. Depending on these results, they may recommend tests to find out if your child has a central nervous system tumor.

The following tests may be used to diagnose a glioma, neuronal tumor, or glioneuronal tumor. The results will also help you and your child's doctor plan treatment.

#### Magnetic resonance imaging (MRI) with or without gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of the brain and spinal cord. Sometimes a substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI). Magnetic resonance spectroscopy (MRS) may be done during the same MRI scan to look at the chemical makeup of the brain tissue.

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### Immunohistochemistry

Immunohistochemistry is a laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer. An MIB-1 test is a type of immunohistochemistry that checks tumor tissue for an antigen called MIB-1. This may show how fast a tumor is growing.

#### Molecular testing

A molecular test checks for certain genes, proteins, or other molecules in a sample of tissue, blood, or bone marrow. Molecular tests also check for certain changes in a gene or chromosome that may cause or affect the chance of developing a brain tumor. A molecular test may be used to help plan treatment, find out how well treatment is working, or make a prognosis.

The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).

#### Surgery to diagnose and possibly remove the glioma

Your child might have surgery to diagnose or to remove all or part of the glioma. During the surgery, the surgeon removes a part of the skull, which gives an opening to remove the tumor. Sometimes scans are done during the procedure to help the surgeon locate the tumor and remove it. A pathologist will study the tumor under a microscope. If cancer cells are found, the surgeon may remove as much tumor as safely possible during the same surgery. The piece of skull is usually put back in place after the procedure.

Craniotomy. An opening is made in the skull and a piece of the skull is removed to show part of the brain.

Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.

Sometimes tumors form in a place that makes them hard to remove. If removing the tumor may cause severe physical, emotional, or learning problems, a biopsy is done and more treatment is given after the biopsy.

Children who have a rare genetic condition called neurofibromatosis type 1 may be at risk of a low-grade glioma called optic pathway glioma that forms in the area of the brain that controls vision. These children may not need a biopsy to diagnose the tumor. Surgery to remove the tumor may not be needed if the tumor does not grow and symptoms do not occur.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another approach, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Stages and tumor grades of childhood glioma (including astrocytoma)

Staging is the process of learning the extent of cancer in the body and is often used to help plan treatment and make a prognosis. There is no staging system used for childhood glioma, but it is given a tumor grade. Tumor grading is based on World Health Organization (WHO) criteria.

Tumor grade describes how abnormal the cancer cells look under a microscope, how quickly the tumor is likely to grow and spread within the central nervous system, and how likely the tumor is to come back after treatment.

There are four grades of gliomas, but they are most often grouped into low grade (grades I or II) or high grade (grades III or IV):

- Low-grade gliomas grow slowly and do not spread within the brain and spinal cord. But as they grow, they press on nearby healthy areas of the brain, affecting brain function. Most low-grade gliomas are treatable.
- High-grade gliomas are fast growing and often spread within the brain and spinal cord, which makes them harder to treat.

Childhood gliomas usually do not spread to other parts of the body.

### Recurrent glioma

When a glioma comes back after it has been treated it is called a recurrent glioma. A glioma may come back in the same place as the first tumor or in other areas of the brain or spinal cord. Tests will be done to help determine if and where the cancer has returned. The type of treatment that your child will have for recurrent glioma will depend on where it came back.

Sometimes a low-grade glioma can come back as a high-grade glioma. High-grade gliomas often come back within 3 years either in the place where the cancer first formed or somewhere else in the brain or spinal cord.

Progressive childhood glioma is cancer that continues to grow, spread, or get worse. Progressive disease can be a sign that the cancer no longer responds to treatment.

### Types of treatment for childhood glioma (including astrocytoma)

There are different types of treatment for children and adolescents with glioma. You and your child's cancer care team will work together to decide treatment. Many factors will be considered, such as your child's overall health, the tumor grade, and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, will oversee treatment. The pediatric oncologist works with other health care providers who are experts in treating children with brain tumors and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric neurosurgeon
- neurologist
- neuropathologist
- neuroradiologist
- rehabilitation specialist
- radiation oncologist
- endocrinologist
- psychologist
- social worker
- child-life specialist
- fertility specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, see our downloadable booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

#### Surgery

Surgery is used to diagnose and treat childhood gliomas, as discussed in the Tests to diagnose childhood glioma (including astrocytoma) (https://www.cancer.gov/types/brain/patient/childhood-glioma-astrocytoma#_29) section of this summary. After surgery, an MRI (magnetic resonance imaging) is done to see if any cancer cells remain. If cancer cells are found, further treatment depends on:

- where the remaining cancer cells are
- the grade of the tumor
- your child's age

After the doctor removes all the cancer that can be seen at the time of the surgery, some children may be given chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

Sometimes children with a glioma have increased fluid around the brain or spinal cord. They may need surgery to place a shunt (long, thin tube) in a ventricle (fluid-filled space) of the brain and thread it under the skin to another part of the body, usually the abdomen. The shunt carries extra fluid away from the brain so it may be absorbed elsewhere in the body. This decreases the fluid and pressure on the brain or spinal cord. This process is called a CSF shunt.

A cerebrospinal fluid (CSF) shunt (a long, thin tube) carries extra CSF away from the brain so it may be absorbed elsewhere in the body. The shunt is placed in a ventricle (fluid-filled space) in the brain and threaded under the skin to another part of the body, usually the abdomen. The shunt has a valve that controls the flow of CSF.

Drawing shows extra cerebrospinal fluid (CSF) flowing through a shunt (a long, thin tube) from a ventricle (fluid-filled space) in the brain into the abdomen. The shunt goes from the ventricle, under the skin in the neck and chest, and into the abdomen. Also shown is a shunt valve that controls the flow of CSF.

#### Observation

Observation is closely monitoring a person's condition without giving any treatment or additional treatment until signs or symptoms appear or change. Observation may be used:

- if your child has no symptoms, such as children with neurofibromatosis type 1 (NF1)
- if your child's tumor is small and is found when a different health problem is being diagnosed or treated
- after the tumor is removed by surgery until signs or symptoms appear or change

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

To treat a glioma, chemotherapy is taken by mouth or injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Chemotherapy that may be used includes:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- lenalidomide (https://www.cancer.gov/about-cancer/treatment/drugs/lenalidomide)
- lomustine (https://www.cancer.gov/about-cancer/treatment/drugs/lomustine)
- procarbazine (https://www.cancer.gov/about-cancer/treatment/drugs/procarbazinehydrochloride)
- temozolomide (https://www.cancer.gov/about-cancer/treatment/drugs/temozolomide)
- thioguanine (https://www.cancer.gov/about-cancer/treatment/drugs/thioguanine)
- vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Combinations of these drugs may be used. Other chemotherapy drugs not listed here may also be used.

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Glioma may be treated with external beam radiation therapy. This type of treatment uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be given alone or with other treatments, such as chemotherapy.

Certain ways of giving external beam radiation therapy can help keep radiation from damaging nearby healthy tissue. These types of radiation therapy include:

- Conformal radiation therapy uses a computer to make a 3-dimensional (3-D) picture of the tumor and shapes the radiation beams to fit the tumor. This allows a high dose of radiation to reach the tumor and causes less damage to nearby healthy tissue.
- Intensity-modulated radiation therapy (IMRT) uses a computer to make 3-D pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed at the tumor from many angles.
- Stereotactic radiation therapy uses a machine that aims radiation directly at the tumor causing less damage to nearby healthy tissue. The total dose of radiation is divided into several smaller doses given over several days. A rigid head frame is attached to the skull to keep the head still during the radiation treatment. This procedure is also called stereotactic radiosurgery and stereotaxic radiation therapy.
- Proton beam radiation therapy is a type of high-energy, external radiation therapy that uses streams of protons (tiny particles with a positive charge) to kill tumor cells. This type of treatment can lower the amount of radiation damage to healthy tissue near a tumor.

The way radiation therapy is given depends on the type of tumor and where the tumor formed in the brain or spinal cord.

Radiation therapy to the brain can affect growth and development, especially in young children. For children younger than 3 years, chemotherapy may be given instead, to delay or reduce the need for radiation therapy. Radiation therapy may also be delayed for patients with NF1 because they may be at increased risk for a second cancer.

To learn more, see External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells.

Targeted therapies that may be used or are being studied to treat glioma include:

- bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)
- dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib)
- everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus)
- larotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)
- selumetinib (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)
- sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles)
- trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Clinical trials

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for people with cancer. Because cancer in children is rare, taking part in a clinical trial should be considered.

Use our clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Some clinical trials are open only to patients who have not started treatment. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

To learn more, see Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

##### Immunotherapy

Immunotherapy helps a person's immune system fight cancer.

The following treatments are being studied to treat glioma:

- oncolytic virus therapy
- chimeric antigen receptor (CAR) T-cell therapy
- drugs that block the activity of PD-1

Learn more about how immunotherapy works against cancer, how it is given, and possible side effects, and more in Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### Treatment of newly diagnosed childhood low-grade glioma, astrocytoma, neuronal, and glioneuronal tumors

Children with neurofibromatosis type 1 and a central nervous system tumor, children with an optic pathway glioma, or children who had a tumor found when getting a scan for another health problem may be observed (closely watched). These children may not receive treatment until signs or symptoms appear or change or the tumor grows.

Children with tuberous sclerosis may develop low-grade tumors in the brain called subependymal giant cell astrocytoma (SEGAs). Targeted therapy with everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus) or sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles) may be used instead of surgery, to shrink the tumors.

Children diagnosed with low-grade glioma are treated based on where the tumor is located. The first treatment is usually surgery. An MRI is done after surgery to see if any tumor remains. If the tumor was completely removed by surgery, more treatment may not be needed and the child is closely observed.

If there is tumor remaining after surgery, treatment may include:

- observation for children who had surgery to remove part of the tumor and the tumor is expected to regrow slowly
- combination chemotherapy with or without radiation therapy
- radiation therapy, which may include conformal radiation therapy, intensity-modulated radiation therapy, proton beam radiation therapy, or stereotactic radiation therapy, may be used if the tumor does not respond to chemotherapy or when the tumor begins to grow again
- targeted therapy (trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib) and dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib))
- a clinical trial of targeted therapy (selumetinib (https://www.cancer.gov/about-cancer/treatment/drugs/selumetinibsulfate)) with or without chemotherapy

To learn more about these treatments, see Types of treatment for childhood glioma (including astrocytoma) (https://www.cancer.gov/types/brain/patient/childhood-glioma-astrocytoma#_117).

### Treatment of progressive or recurrent childhood low-grade glioma, astrocytoma, neuronal, or glioneuronal tumors

Childhood glioma, astrocytoma, glioneuronal, and neuronal tumors can be progressive or recurrent. They most often come back in the same area but can spread to other areas in the brain. Before more cancer treatment is given, imaging tests, biopsy, or surgery are done to find out if there is cancer, how much there is, and the grade.

Treatment of progressive or recurrent childhood low-grade glioma, astrocytoma, glioneuronal, and neuronal tumors may include:

- a second surgery to remove the tumor
- radiation therapy (including conformal radiation therapy), if radiation therapy was not used when the tumor was first diagnosed
- chemotherapy, if the tumor progressed or recurred where it cannot be removed by surgery
- targeted therapy (bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab)) with or without chemotherapy
- targeted therapy (everolimus (https://www.cancer.gov/about-cancer/treatment/drugs/everolimus) or sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles))
- targeted therapy (dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib) and trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib))

To learn more about these treatments, see Types of treatment for childhood glioma (including astrocytoma) (https://www.cancer.gov/types/brain/patient/childhood-glioma-astrocytoma#_117).

### Treatment of childhood high-grade gliomas

Treatment of newly diagnosed childhood high-grade glioma may include:

- surgery to remove the tumor
- radiation therapy with or without chemotherapy
- a clinical trial of targeted therapy with a combination of dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib) and trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib) after radiation therapy to treat newly diagnosed high-grade glioma that has mutations in the BRAF gene
- a clinical trial of immunotherapy

To learn more about these treatments, see Types of treatment for childhood glioma (including astrocytoma) (https://www.cancer.gov/types/brain/patient/childhood-glioma-astrocytoma#_117).

### Treatment of recurrent childhood high-grade gliomas

Treatment of recurrent childhood high-grade glioma may include:

- second surgery depending on tumor type, location, and length of time between treatment and recurrence
- radiation therapy
- targeted therapy (dabrafenib (https://www.cancer.gov/about-cancer/treatment/drugs/dabrafenib) and trametinib (https://www.cancer.gov/about-cancer/treatment/drugs/trametinib))
- a clinical trial of targeted therapy
- a clinical trial of immunotherapy

To learn more about these treatments, see Types of treatment for childhood glioma (including astrocytoma) (https://www.cancer.gov/types/brain/patient/childhood-glioma-astrocytoma#_117).

### Prognosis and prognostic factors for childhood glioma (including astrocytoma)

If your child has been diagnosed with a glioma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on many factors, including:

- whether the tumor is a low-grade or high-grade glioma
- where the tumor has formed in the central nervous system and if it has spread within the central nervous system or to other parts of the body
- how fast the tumor is growing
- your child's age
- whether cancer cells remain after surgery
- whether there are changes in certain genes such as BRAF
- whether your child has NF1 or tuberous sclerosis
- whether your child has diencephalic syndrome, a condition which slows physical growth
- whether the glioma has just been diagnosed or has come back after treatment

Children with a low-grade glioma, astrocytoma, neuronal tumor, or glioneuronal tumor have a relatively favorable prognosis if the tumor can be removed by surgery.

Children with a high-grade glioma have a poor prognosis. Some children diagnosed with a high-grade glioma, particularly infants younger than 1 year, may have tumors with certain fusion genes. Infants with a high-grade glioma whose tumors show these genetic changes may have a better prognosis than older children with a high-grade glioma.

For glioma that has come back after treatment, prognosis and treatment depend on how much time passed between the time treatment ended and the time the glioma came back.

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Side effects from the tumor and treatment

The signs or symptoms caused by the tumor may begin before diagnosis and continue for months or years. It is important to talk with your child's doctors about signs or symptoms caused by the tumor that may continue after treatment.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems that affect:
  - vision, including blindness
  - blood vessels
  - hormone levels
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. To learn more, see Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or checkups. Some of the tests that were done to diagnose the cancer will be repeated in order to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Regular MRIs will continue to be done after treatment has ended. The results of the MRI can show if your child's condition has changed or if the glioma has come back. If the results of the MRI show a mass in the brain, a biopsy may be done to find out if it is made up of dead tumor cells or if new cancer cells are growing.

Children who received radiation therapy to treat an optic pathway glioma are at risk of developing vision changes. These changes are most likely to occur within 2 years after radiation therapy. The effect of tumor growth and treatment on the child's vision will be closely followed during and after treatment.

### Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families When a Child Has Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Related resources

For more childhood cancer information and other general cancer resources, see:

- Pediatric Brain Tumor Consortium (PBTC) (https://www.pbtc.org/)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)